# Neuroblastoma Treatment (PDQ®)

Patient Version

This PDQ cancer information summary has current information about the treatment of neuroblastoma. It is meant to inform and help patients, families, and caregivers. It does not give formal guidelines or recommendations for making decisions about health care.

Editorial Boards write the PDQ cancer information summaries and keep them up to date. These Boards are made up of experts in cancer treatment and other specialties related to cancer. The summaries are reviewed regularly and changes are made when there is new information. The date on each summary ("Date Last Modified") is the date of the most recent change. The information in this patient summary was taken from the health professional version, which is reviewed regularly and updated as needed, by the PDQ Pediatric Treatment Editorial Board.

## General Information About Neuroblastoma

Key Points for This Section
- Neuroblastoma is a type of cancer that forms in neuroblasts (immature nerve tissue) in the adrenal glands, neck, chest, or spinal cord.
- Certain genetic conditions affect the risk of having neuroblastoma.
- Genetic testing can determine whether a child has an inherited form of neuroblastoma.
- Sometimes children with certain gene mutations should be checked for signs of neuroblastoma.
- Signs and symptoms of neuroblastoma include bone pain or a lump in the abdomen, neck, or chest.
- Tests that examine many different body tissues and fluids are used to diagnose neuroblastoma.
- Getting a second opinion.
- Certain factors affect prognosis (chance of recovery) and treatment options.

### Neuroblastoma is a type of cancer that forms in neuroblasts (immature nerve tissue) in the adrenal glands, neck, chest, or spinal cord.

Neuroblastoma often begins in the nerve tissue of the adrenal glands. There are two adrenal glands, one on top of each kidney in the back of the upper abdomen. The adrenal glands make important hormones that help control heart rate, blood pressure, blood sugar, and the way the body reacts to stress.

Neuroblastoma may be found in the adrenal glands and paraspinal nerve tissue from the neck to the pelvis.

Drawing shows parts of the body where neuroblastoma may be found, including the paraspinal nerve tissue and the adrenal glands. Also shown are the spine and right and left kidney.

Neuroblastoma most often begins in infancy. It is usually diagnosed between the first month of life and age 5 years. The tumor is found when it begins to grow and cause signs or symptoms. Sometimes it forms before birth and is found during an ultrasound of the baby.

By the time cancer is diagnosed, it has usually metastasized (spread). Neuroblastoma spreads most often to the lymph nodes, bones, bone marrow, liver, and skin in infants and children. Adolescents may also have metastasis to the lungs and brain.

### Certain genetic conditions affect the risk of having neuroblastoma.

Neuroblastoma is caused by certain changes to the way neuroblast cells function, especially how they grow and divide into new cells. There are many risk factors for neuroblastoma, but many do not directly cause cancer. Instead, they increase the chance of DNA damage in cells that may lead to neuroblastoma. Learn more about how cancer develops at What Is Cancer? (https://www.cancer.gov/about-cancer/understanding/what-is-cancer)

A risk factor is anything that increases the chance of getting a disease. Some risk factors can be changed. Risk factors also include things people cannot change, like family history. It's important to learn about risk factors for neuroblastoma because it can help you make choices about screening for cancer.

Possible risk factors for neuroblastoma include:

- having certain changes in genes (ALK or PHOX2B)
- having certain genetic conditions, such as:
  - Costello syndrome
  - Noonan syndrome
  - neurofibromatosis type 1
  - Li-Fraumeni syndrome
  - Beckwith-Wiedemann syndrome
  - pheochromocytoma/paraganglioma syndromes
  - ROHHAD syndromes (rapid-onset obesity, hypothalamic dysfunction, hypoventilation, and autonomic dysfunction)
- having a strong family history of neuroblastoma

### Genetic testing can determine whether a child has an inherited form of neuroblastoma.

Gene mutations that increase the risk of neuroblastoma are sometimes inherited (passed from the parent to the child). In children with a gene mutation, neuroblastoma usually occurs at a younger age, and more than one tumor may form in the adrenal glands or in the nerve tissue in the neck, chest, abdomen, or pelvis.

It is not always clear from the family medical history whether a condition is inherited. Certain families may benefit from genetic counseling and genetic testing. Genetic counselors and other specially trained health professionals can discuss a child's diagnosis and the family's medical history to understand:

- the options for ALK or PHOX2B gene testing
- the risk of neuroblastoma for your child and your child's siblings
- the risks and benefits of learning genetic information

Genetic counselors can also help parents cope with their child's genetic testing results, including how to discuss the results with family members.

Once it is known that your child has an inherited form of neuroblastoma, other family members can be screened for the ALK or PHOX2B mutation.

Learn more about genetic testing at Genetic Testing for Inherited Cancer Risk (https://www.cancer.gov/about-cancer/causes-prevention/genetics/genetic-testing-fact-sheet).

### Sometimes children with certain gene mutations should be checked for signs of neuroblastoma.

Children with certain gene mutations or hereditary (inherited) syndromes should be checked for signs of neuroblastoma until they are 10 years old. The following tests may be used:

- Abdominal ultrasound: A test in which high-energy sound waves (ultrasound) are bounced off the abdomen and make echoes. The echoes form a picture of the abdomen called a sonogram.
- Urine catecholamine studies: A test in which a urine sample is checked to measure the amounts of certain substances, vanillylmandelic acid (VMA) and homovanillic acid (HVA), that are made when catecholamines break down and are released into the urine. A higher-than-normal amount of VMA or HVA can be a sign of neuroblastoma.
- Chest x-ray: An x-ray of the organs and bones inside the chest. An x-ray is a type of energy beam that can go through the body and onto film, making a picture of areas inside the body.

Talk to your child's doctor about how often these tests need to be done.

### Signs and symptoms of neuroblastoma include bone pain or a lump in the abdomen, neck, or chest.

The most common signs and symptoms of neuroblastoma are caused by the tumor pressing on nearby tissues as it grows or by cancer spreading to the bone.

Check with your child's doctor if your child has:

- a lump in the abdomen, neck, or chest
- bone pain
- a swollen stomach and trouble breathing (in infants)
- bulging eyes
- dark circles around the eyes ("black eyes")
- painless, bluish lumps under the skin (in infants)
- weakness or paralysis (loss of ability to move a body part)

Less common signs and symptoms of neuroblastoma include:

- fever
- shortness of breath
- feeling tired
- easy bruising or bleeding
- petechiae (flat, pinpoint spots under the skin caused by bleeding)
- high blood pressure
- severe watery diarrhea
- Horner syndrome (droopy eyelid, smaller pupil, and less sweating on one side of the face)
- jerky muscle movements
- uncontrolled eye movements

These and other signs and symptoms may be caused by neuroblastoma or by other conditions. The only way to know is to see your child's doctor.

### Tests that examine many different body tissues and fluids are used to diagnose neuroblastoma.

If your child has symptoms that suggest neuroblastoma, the doctor will need to find out if these are due to cancer or another condition. The doctor will ask when the symptoms started and how often your child has been having them. They will also ask about your child's personal and family medical history and do a physical exam.

Depending on your child's symptoms and medical history and the results of their physical and neurological exam, the doctor may recommend more tests to find out if your child has neuroblastoma, and if so, its extent (stage). If neuroblastoma is diagnosed, the results of these tests and procedures will help you and your child's doctor make decisions about treatment.

The following tests and procedures may be used:

- Urine catecholamine studies: A test in which a urine sample is checked to measure the amounts of certain substances, vanillylmandelic acid (VMA) and homovanillic acid (HVA), that are made when catecholamines break down and are released into the urine. A higher-than-normal amount of VMA or HVA can be a sign of neuroblastoma.
- Blood chemistry studies: A test in which a blood sample is checked to measure the amounts of certain substances released into the blood by organs and tissues in the body. A higher-than-normal amount of lactate dehydrogenase (LDH) can be a sign of disease.
- Ferritin level: A test in which a blood sample is checked to measure the amount of ferritin (a protein that stores iron in cells). A higher-than-normal amount may be a sign of disease.
- MIBG scan: A procedure used to find neuroendocrine tumors, such as neuroblastoma. A very small amount of a substance called radioactive MIBG is injected into a vein and travels through the bloodstream. Neuroendocrine tumor cells take up the radioactive MIBG and are detected by a scanner. Scans may be taken over 1–3 days. An iodine solution may be given before or during the test to keep the thyroid gland from absorbing too much of the MIBG. This test is also used to find out how well the tumor is responding to treatment. MIBG is also used in high doses to treat neuroblastoma.
- CT scan (CAT scan): A procedure that makes a series of detailed pictures of areas inside the body, taken from different angles. The pictures are made by a computer linked to an x-ray machine. A dye may be injected into a vein or swallowed to help the organs or tissues show up more clearly. This procedure is also called computed tomography, computerized tomography, or computerized axial tomography. Learn more about Computed Tomography (CT) Scans and Cancer (https://www.cancer.gov/about-cancer/diagnosis-staging/ct-scans-fact-sheet).
  Computed tomography (CT) scan. The child lies on a table that slides through the CT scanner, which takes a series of detailed x-ray pictures of areas inside the body.
  Computed tomography (CT) scan; drawing shows a child lying on a table that slides through the CT scanner, which takes a series of detailed x-ray pictures of areas inside the body.
- MRI (magnetic resonance imaging) with gadolinium: A procedure that uses a magnet, radio waves, and a computer to make a series of detailed pictures of areas inside the body. A substance called gadolinium is injected into a vein. The gadolinium collects around the cancer cells so they show up brighter in the picture. This procedure is also called nuclear magnetic resonance imaging (NMRI).
  Magnetic resonance imaging (MRI) scan. The child lies on a table that slides into the MRI machine, which takes a series of detailed pictures of areas inside the body. The positioning of the child on the table depends on the part of the body being imaged.
  Magnetic resonance imaging (MRI) scan; drawing shows a child lying on a table that slides into the MRI machine, which takes a series of detailed pictures of areas inside the body.
- PET scan (positron emission tomography scan): A procedure to find malignant tumor cells in the body. A small amount of radioactive glucose (sugar) is injected into a vein. The PET scanner rotates around the body and makes a picture of where glucose is being used in the body. Malignant tumor cells show up brighter in the picture because they are more active and take up more glucose than normal cells do. This test will usually only be done if the tumor does not take up MIBG.
- X-ray of the chest or bone: An x-ray is a type of energy beam that can go through the body and onto film, making a picture of areas inside the body.
- Ultrasound exam: A procedure in which high-energy sound waves (ultrasound) are bounced off internal tissues or organs and make echoes. The echoes form a picture of body tissues called a sonogram. An ultrasound exam is not done if a CT/MRI has been done.
  Abdominal ultrasound. An ultrasound transducer connected to a computer is pressed against the skin of the abdomen. The transducer bounces sound waves off internal organs and tissues to make echoes that form a sonogram (computer picture).
  Abdominal ultrasound; drawing shows a child lying on an exam table during an abdominal ultrasound procedure. A technician is shown pressing a transducer (a device that makes sound waves that bounce off tissues inside the body) against the skin of the abdomen. A computer screen shows a sonogram (picture).
- Tumor biopsy: Cells and tissues are removed during a biopsy so they can be viewed under a microscope by a pathologist to check for signs of cancer. The way the biopsy is done depends on where the tumor is in the body. Sometimes the whole tumor is removed at the same time the biopsy is done. The doctor who reviews the tumor biopsy will determine if the tumor appears to have more favorable or unfavorable features. These features may affect treatment and survival.
  Children up to age 6 months may not need a biopsy or surgery to remove the tumor because the tumor may disappear without treatment.
- Bone marrow aspiration and biopsy: The removal of bone marrow, blood, and a small piece of bone by inserting a hollow needle into the hipbone or breastbone. A pathologist views the bone marrow, blood, and bone under a microscope to look for signs of cancer. This test is also used to stage the tumor.
  Bone marrow aspiration and biopsy. After a small area of skin is numbed, a bone marrow needle is inserted into the child’s hip bone. Samples of blood, bone, and bone marrow are removed for examination under a microscope.
  Bone marrow aspiration and biopsy; drawing shows a child lying face down on a table and a bone marrow needle being inserted into the right hip bone. An inset shows the bone marrow needle being inserted through the skin into the bone marrow of the hip bone.
- Lymph node biopsy: The removal of all or part of a lymph node. A pathologist views the lymph node tissue under a microscope to check for cancer cells. This test is used to diagnose and stage the tumor. One of the following types of biopsies may be done:
  - Excisional biopsy: The removal of an entire lymph node.
  - Incisional biopsy: The removal of part of a lymph node.
  - Core biopsy: The removal of tissue from a lymph node using a wide needle.
  - Fine-needle aspiration (FNA) biopsy: The removal of tissue or fluid from a lymph node using a thin needle.
- Light microscopy: A laboratory test in which cells in a sample of tissue are viewed under regular and high-powered microscopes to look for certain changes in the cells.
- Immunohistochemistry: A laboratory test that uses antibodies to check for certain antigens (markers) in a sample of a patient’s tissue. The antibodies are usually linked to an enzyme or a fluorescent dye. After the antibodies bind to a specific antigen in the tissue sample, the enzyme or dye is activated, and the antigen can then be seen under a microscope. This type of test is used to help diagnose cancer and to help tell one type of cancer from another type of cancer.
- Molecular testing: A molecular test checks for certain genes, proteins, or other molecules in a sample of tissue, blood, or bone marrow. Molecular tests also check for certain changes in a gene or chromosome that may cause or affect the chance of developing neuroblastoma. A molecular test may be used to help plan treatment, find out how well treatment is working, or make a prognosis.
  Children with newly diagnosed high-risk neuroblastoma may be eligible for molecular testing through the Molecular Characterization Initiative.
  The Molecular Characterization Initiative offers free molecular testing to children, adolescents, and young adults with certain types of newly diagnosed cancer. The program is offered through NCI's Childhood Cancer Data Initiative. To learn more, visit About the Molecular Characterization Initiative (https://www.cancer.gov/research/areas/childhood/childhood-cancer-data-initiative/data-ecosystem/molecular-characterization).
- Biomarker testing: Biomarker testing is a way to look for genes, proteins, and other substances (called biomarkers or tumor markers) that can provide information about cancer. Some biomarkers affect how certain cancers behave and how certain treatments work. Biomarker testing may help your doctor choose a cancer treatment.
  To check for these biomarkers, samples of tissue containing neuroblastoma cells are removed during a biopsy or surgery and tested in a laboratory.
  Neuroblastoma biomarker testing includes:
  - MYCN amplification study: A laboratory study in which cells in a sample of tumor or bone marrow are checked to see how many copies of the MYCN gene are in the tumor DNA. MYCN is important for cell growth. Having more than 10 copies of the gene is called MYCN amplification. Neuroblastoma with MYCN amplification is more likely to spread in the body and more likely to show rapid growth.
  - ALK: The tumor cells may be checked in the laboratory for mutations or amplification (checking the number) of the ALK gene. These changes may increase the growth of cancer cells. Finding changes in the ALK gene in tumor tissue may lead to changes in the cancer treatment plan.
  - Cytogenetic analysis: A laboratory test in which the number and structure of chromosomes of cells in a sample of tissue are counted and checked for any changes, such as broken, missing, rearranged, or extra chromosomes. Changes in certain chromosomes may be a sign of cancer. Cytogenetic analysis is used to help diagnose cancer, plan treatment, or find out how well treatment is working.
- ALK or PHOX2B genetic tests: A laboratory test in which a sample of blood or tissue is tested for a change in the ALK gene or PHOX2B gene in normal cells.

### Getting a second opinion.

You may want to get a second opinion to confirm their child's neuroblastoma diagnosis and treatment plan. If you seek a second opinion, you will need to get medical test results and reports from the first doctor to share with the second doctor. The second doctor will review the genetic test results, pathology report, slides, and scans. This doctor may agree with the first doctor, suggest changes to the treatment plan, or provide more information about your child's cancer.

To learn more about choosing a doctor and getting a second opinion, see Finding Cancer Care (https://www.cancer.gov/about-cancer/managing-care/finding-cancer-care). You can contact NCI's Cancer Information Service (https://www.cancer.gov/contact) via chat, email, or phone (both in English and Spanish) for help finding a doctor or hospital that can provide a second opinion. For questions you might want to ask at your child's appointments, see Questions to Ask Your Doctor About Cancer (https://www.cancer.gov/about-cancer/coping/questions).

### Certain factors affect prognosis (chance of recovery) and treatment options.

If your child has been diagnosed with neuroblastoma, you may have questions about how serious the cancer is and your child's chances of survival. The likely outcome or course of a disease is called prognosis.

The prognosis and treatment options depend on:

- age at the time of diagnosis
- the child's risk group
- whether there are certain changes in the MYCN or ALK genes
- whether the tumor is diploid or hyperdiploid
- whether there are changes to the tumor chromosomes
- the type of tumor neurotrophin receptor
- where in the body the tumor started (abdomen, chest, neck, or spine)
- the stage of the cancer
- levels of LDH and ferritin
- how the tumor responds to treatment
- how much time passed between diagnosis and when the cancer recurred (for recurrent cancer)

Prognosis and treatment options for neuroblastoma are also affected by tumor histology, which includes:

- the patterns of the tumor cells
- how different the tumor cells are from normal cells
- how fast the tumor cells are growing

The tumor histology is said to be favorable or unfavorable, depending on these factors. A child with favorable tumor histology has a better chance of recovery.

In some children up to age 6 months, neuroblastoma may disappear without treatment. This is called spontaneous regression. The child is closely watched for signs or symptoms of neuroblastoma. If signs or symptoms occur, treatment may be needed.

## Stages of Neuroblastoma

Key Points for This Section
- After neuroblastoma has been diagnosed, tests are done to find out if cancer has spread from where it started to other parts of the body.
- The International Neuroblastoma Risk Group Staging System (INRGSS) is used to determine the stage of neuroblastoma.
  - Stage L1
  - Stage L2
  - Stage M
  - Stage MS
- Treatment of neuroblastoma is based on risk groups.
- Sometimes neuroblastoma does not respond to treatment or comes back after treatment.

### After neuroblastoma has been diagnosed, tests are done to find out if cancer has spread from where it started to other parts of the body.

The process used to find out the extent or spread of cancer is called staging. The information gathered from the staging process helps determine the stage of the disease. For neuroblastoma, the stage of disease affects whether the cancer is low risk, intermediate risk, or high risk. It also affects the treatment plan. The results of some tests and procedures used to diagnose neuroblastoma may be used for staging. See the General Information section for a description of these tests and procedures.

### The International Neuroblastoma Risk Group Staging System (INRGSS) is used to determine the stage of neuroblastoma.

#### Stage L1

In stage L1, the cancer is in only one area, and there are no image-defined risk factors (IDRFs). IDRFs are found on MRI or CT scans done during diagnosis. IDRFs are used to determine the risk of surgery and the chance of completely removing the tumor.

#### Stage L2

In stage L2, the cancer is in one area, has not spread beyond nearby tissue, and there are one or more IDRFs.

#### Stage M

In stage M, neuroblastoma has spread to areas far from the tumor. This does not include stage MS.

#### Stage MS

In stage MS, children younger than 18 months have cancer that has spread to the skin, liver, or bone marrow.

### Treatment of neuroblastoma is based on risk groups.

For many types of cancer, stages are used to plan treatment. For neuroblastoma, treatment depends on the patient's risk group. The risk group is determined by the following factors:

- the stage of the cancer
- the child's age at diagnosis
- the International Neuroblastoma Pathologic Classification (INPC) (tumor histology)
- whether the tumors are diploid or hyperdiploid (DNA index)
- whether the cancer gene MYCN is found in the tumor cells
- how much of the cancer could be removed by surgery

There are three risk groups: low risk, intermediate risk, and high risk.

- Low-risk and intermediate-risk neuroblastoma have a good chance of being cured.
- High-risk neuroblastoma may be hard to cure.

For more information on the risk group classification, see the Revised International Neuroblastoma Response Criteria (INRC) section in Neuroblastoma Treatment (Health Professional Version).

### Sometimes neuroblastoma does not respond to treatment or comes back after treatment.

Refractory neuroblastoma is a tumor that does not respond to treatment.

Recurrent neuroblastoma is cancer that has recurred (come back) after it has been treated. The tumor may come back in the site where it began or in the central nervous system.

## Treatment Option Overview

Key Points for This Section
- There are different types of treatment for children with neuroblastoma.
- Children with neuroblastoma should have their treatment planned by a team of doctors who are experts in treating childhood cancer, especially neuroblastoma.
- The following types of treatment may be used:
  - Observation
  - Surgery
  - Chemotherapy
  - Radiation therapy
  - High-dose chemotherapy and radiation therapy with stem cell rescue
  - Iodine 131-MIBG therapy
  - Targeted therapy
  - Other drug therapy
  - Immunotherapy
- New types of treatment are being tested in clinical trials.
- Treatment for neuroblastoma causes side effects and late effects.
- Follow-up care may be needed.

### There are different types of treatment for children with neuroblastoma.

There are different types of treatment for children and adolescents with neuroblastoma. You and your child's cancer team will work together to decide treatment. Many factors will be considered, such as your child's overall health and whether the cancer is newly diagnosed or has come back.

### Children with neuroblastoma should have their treatment planned by a team of doctors who are experts in treating childhood cancer, especially neuroblastoma.

A pediatric oncologist, a doctor who specializes in treating children with cancer, will oversee treatment. The pediatric oncologist works with other pediatric health care professionals who are experts in treating children with cancer and who specialize in certain areas of medicine. These may include the following specialists and others:

- pediatric surgeon
- pediatric radiation oncologist
- endocrinologist
- neurologist
- pediatric neuropathologist
- neuroradiologist
- pediatrician
- pediatric nurse specialist
- social worker
- child life professional
- psychologist

Your child's treatment plan will include information about the cancer, the goals of treatment, treatment options, and the possible side effects. It will be helpful to talk with your child's cancer care team before treatment begins about what to expect. For help every step of the way, see our downloadable booklet, Children with Cancer: A Guide for Parents (https://www.cancer.gov/publications/patient-education/guide-for-parents).

### The following types of treatment may be used:

#### Observation

Observation is closely monitoring a patient's condition without giving any treatment until signs or symptoms appear or change.

#### Surgery

Surgery is used to treat neuroblastoma that has not spread to other parts of the body. As much of the tumor as is safely possible is removed. Lymph nodes are also removed and checked for signs of cancer.

If the tumor cannot be removed, a biopsy may be done instead.

Learn more about Surgery to Treat Cancer (https://www.cancer.gov/about-cancer/treatment/types/surgery).

#### Chemotherapy

Chemotherapy (also called chemo) uses drugs to stop the growth of cancer cells, either by killing the cells or by stopping them from dividing. When chemotherapy is taken by mouth or injected into a vein or muscle, the drugs enter the bloodstream and can reach cancer cells throughout the body (systemic chemotherapy).

The use of two or more anticancer drugs is called combination chemotherapy.

See Drugs Approved for Neuroblastoma (https://www.cancer.gov/about-cancer/treatment/drugs/neuroblastoma) for more information.

Learn more about Chemotherapy to Treat Cancer (https://www.cancer.gov/about-cancer/treatment/types/chemotherapy).

#### Radiation therapy

Radiation therapy is a cancer treatment that uses high-energy x-rays or other types of radiation to kill cancer cells or keep them from growing. There are different types of radiation therapy:

- External radiation therapy uses a machine outside the body to send radiation toward the area of the body with cancer. This treatment is used for patients with high-risk neuroblastoma or for patients whose tumor grew while being treated with chemotherapy.
- Internal radiation therapy uses a radioactive substance sealed in needles, seeds, wires, or catheters that are placed directly into or near the cancer.
- Radioimmunotherapy is a type of radiation therapy in which a radioactive substance is linked to a monoclonal antibody and injected into the body. The monoclonal antibody can bind to substances in the body, including cancer cells. The radioactive substance gives off radiation, which may help kill cancer cells.

Learn more about Radiation Therapy to Treat Cancer (https://www.cancer.gov/about-cancer/treatment/types/radiation-therapy).

#### High-dose chemotherapy and radiation therapy with stem cell rescue

High-dose chemotherapy and radiation therapy are given to kill any cancer cells that may regrow and cause the cancer to come back. Healthy cells, including blood-forming cells, are also destroyed by the cancer treatment. Stem cell rescue is a treatment to replace the blood-forming cells. Stem cells (immature blood cells) are removed from the blood or bone marrow of the patient and are frozen and stored. After the completion of chemotherapy and radiation therapy, the stored stem cells are thawed and given back to the patient through an infusion. These reinfused stem cells grow into (and restore) the body's blood cells.

#### Iodine 131-MIBG therapy

Iodine 131-MIBG therapy is a treatment with radioactive iodine. The radioactive iodine is given through an intravenous (IV) line and enters the bloodstream, which carries radiation directly to tumor cells. Radioactive iodine collects in neuroblastoma cells and kills them with the radiation that is given off. Iodine 131-MIBG therapy is sometimes used to treat high-risk neuroblastoma that comes back after initial treatment.

#### Targeted therapy

Targeted therapy uses drugs or other substances to block the action of specific enzymes, proteins, or other molecules involved in the growth and spread of cancer cells.

- Monoclonal antibody therapy: Monoclonal antibodies are immune system proteins made in the laboratory to treat many diseases, including cancer. As a cancer treatment, these antibodies can attach to a specific target on cancer cells or other cells that may help cancer cells grow. The antibodies are able to then kill the cancer cells, block their growth, or keep them from spreading. Monoclonal antibodies are given by infusion. They may be used alone or to carry drugs, toxins, or radioactive material directly to cancer cells.
  - Dinutuximab is used to treat patients with high-risk neuroblastoma and neuroblastoma that has come back after treatment or has not responded to treatment.
  monoclonal antibodies: how monoclonal antibodies treat cancer
  How do monoclonal antibodies work to treat cancer? This video shows how monoclonal antibodies, such as trastuzumab, pembrolizumab, and rituximab, block molecules cancer cells need to grow, flag cancer cells for destruction by the body’s immune system, or deliver harmful substances to cancer cells.
  YouTube (https://www.youtube.com/watch?v=dxnjAc-rqz8)
- Ornithine decarboxylase inhibitor therapy slows the growth and division of cancer cells.
  - Eflornithine may be given for two years after maintenance therapy for high-risk neuroblastoma.

Learn more about Targeted Therapy to Treat Cancer (https://www.cancer.gov/about-cancer/treatment/types/targeted-therapies).

#### Other drug therapy

Other drugs used in combination to treat neuroblastoma include:

- Isotretinoin: A vitamin-like drug that slows the cancer's ability to make more cancer cells and changes how these cells look and act. This drug is taken by mouth.

#### Immunotherapy

Immunotherapy helps a child's immune system fight cancer.

- Granulocyte-macrophage colony-stimulating factor (GM-CSF): a cytokine that helps the body make more white blood cells, especially granulocytes and macrophages, which can attack and kill cancer cells. GM-CSF can also enhance the immune system response against cancer by increasing the number of cancer-fighting T cells.
- CAR T-cell therapy: The patient's T cells (a type of immune system cell) are changed so that they will attack certain proteins on the surface of cancer cells. T cells are taken from the patient, and special receptors are added to their surface in the laboratory. The changed cells are called chimeric antigen receptor (CAR) T cells. The CAR T cells are grown in the laboratory and given to the patient by infusion. The CAR T cells multiply in the patient's blood and attack cancer cells.
  CAR T-cell therapy. A type of treatment in which a patient’s T cells (a type of immune cell) are changed in the laboratory so they will bind to cancer cells and kill them. Blood from a vein in the patient’s arm flows through a tube to an apheresis machine (not shown), which removes the white blood cells, including the T cells, and sends the rest of the blood back to the patient. Then, the gene for a special receptor called a chimeric antigen receptor (CAR) is inserted into the T cells in the laboratory. Millions of the CAR T cells are grown in the laboratory and then given to the patient by infusion. The CAR T cells are able to bind to an antigen on the cancer cells and kill them.
  CAR T-cell therapy; drawing of blood being removed from a vein in a patient’s arm to get T cells. Also shown is a special receptor called a chimeric antigen receptor (CAR) being made in the laboratory; the gene for CAR is inserted into the T cells and then millions of CAR T cells are grown. Drawing also shows the CAR T cells being given to the patient by infusion and binding to antigens on the cancer cells and killing them.
  CAR T-cell therapy is being studied to treat neuroblastoma that has come back after treatment or has not responded to treatment.

Learn more about T-Cell Transfer Therapy (https://www.cancer.gov/about-cancer/treatment/types/immunotherapy/t-cell-transfer-therapy).

### New types of treatment are being tested in clinical trials.

A treatment clinical trial is a research study meant to help improve current treatments or obtain information on new treatments for people with cancer. For some patients, taking part in a clinical trial may be an option. Because cancer in children is rare, taking part in a clinical trial should be considered.

Use our clinical trial search (https://www.cancer.gov/research/participate/clinical-trials-search) to find NCI-supported cancer clinical trials that are accepting patients. You can search for trials based on the type of cancer, the age of the patient, and where the trials are being done. Some clinical trials are open only to patients who have not started treatment. Clinical trials supported by other organizations can be found on the ClinicalTrials.gov website.

Learn more at Clinical Trials Information for Patients and Caregivers (https://www.cancer.gov/research/participate/clinical-trials).

### Treatment for neuroblastoma causes side effects and late effects.

To learn more about side effects that begin during treatment for cancer, visit Side Effects (https://www.cancer.gov/about-cancer/treatment/side-effects).

Side effects from cancer treatment that begin after treatment and continue for months or years are called late effects. Late effects of cancer treatment may include:

- physical problems, such as:
  - tooth development
  - intestinal blockage (obstruction)
  - bone and cartilage growth
  - hearing function
  - metabolic syndrome (elevated blood pressure, elevated triglycerides, elevated cholesterol, increased body fat percentage)
- changes in mood, feelings, thinking, learning, or memory
- second cancers (new types of cancer), such as myelodysplastic syndrome, acute myeloid leukemia, thyroid cancer, or kidney cancer

Some late effects may be treated or controlled. It is important to talk with your child's doctors about the effects cancer treatment can have on your child. Learn more about Late Effects of Treatment for Childhood Cancer.

### Follow-up care may be needed.

As your child goes through treatment, they will have follow-up tests or check-ups. Some tests that were done to diagnose or stage the cancer may be repeated to see how well the treatment is working. Decisions about whether to continue, change, or stop treatment may be based on the results of these tests.

Some of the tests will continue to be done from time to time after treatment has ended. The results of these tests can show if your child's condition has changed or if the cancer has recurred (come back).

Follow-up care for children with neuroblastoma may include:

- urine catecholamine studies
- MIBG scan

## Treatment of Low-Risk Neuroblastoma

For information about the treatments listed below, see the Treatment Option Overview section.

Treatment of newly diagnosed low-risk neuroblastoma may include:

- surgery followed by observation
- observation alone for infants younger than 6 months who have small adrenal tumors or for infants who do not have signs or symptoms of neuroblastoma
- observation with biopsy for infants younger than age 1 year who have favorable histology and meet other low-risk criteria
- chemotherapy with or without surgery, for children with symptoms or children whose tumor has continued to grow and cannot be removed by surgery
- chemotherapy, for certain patients
- radiation therapy to treat tumors that are causing serious problems and do not respond quickly to chemotherapy or surgery

Use our clinical trial search (https://www.cancer.gov/research/participate/clinical-trials-search) to find NCI-supported cancer clinical trials that are accepting patients. You can search for trials based on the type of cancer, the age of the patient, and where the trials are being done. General information (https://www.cancer.gov/research/participate/clinical-trials) about clinical trials is also available.

## Treatment of Intermediate-Risk Neuroblastoma

For information about the treatments listed below, see the Treatment Option Overview section.

Treatment of newly diagnosed intermediate-risk neuroblastoma may include:

- Chemotherapy for children with symptoms or to shrink a tumor that cannot be removed by surgery. Surgery may be done after chemotherapy.
- Surgery alone for infants.
- Observation alone for infants.
- Radiation therapy to treat tumors that have continued to grow during treatment with chemotherapy or tumors that cannot be removed by surgery and have continued to grow after treatment with chemotherapy.

Use our clinical trial search (https://www.cancer.gov/research/participate/clinical-trials-search) to find NCI-supported cancer clinical trials that are accepting patients. You can search for trials based on the type of cancer, the age of the patient, and where the trials are being done. General information (https://www.cancer.gov/research/participate/clinical-trials) about clinical trials is also available.

## Treatment of High-Risk Neuroblastoma

For information about the treatments listed below, see the Treatment Option Overview section.

Children with newly diagnosed high-risk neuroblastoma usually receive treatment in three phases: induction, consolidation, and maintenance.

Treatment during induction may include:

- combination chemotherapy
- surgery

Treatment during consolidation may include:

- two courses of high-dose combination chemotherapy followed by stem cell rescue
- radiation therapy

Treatment during maintenance may include monoclonal antibody therapy (dinutuximab), granulocyte-macrophage colony-stimulating factor (GM-CSF), and isotretinoin.

Treatment after maintenance may include eflornithine.

Use our clinical trial search (https://www.cancer.gov/research/participate/clinical-trials-search) to find NCI-supported cancer clinical trials that are accepting patients. You can search for trials based on the type of cancer, the age of the patient, and where the trials are being done. General information (https://www.cancer.gov/research/participate/clinical-trials) about clinical trials is also available.

## Treatment of Stage MS Neuroblastoma

For information about the treatments listed below, see the Treatment Option Overview section.

There is no standard treatment for newly diagnosed stage MS, but treatment options include:

- observation and supportive care for children who have favorable tumor biology and do not have signs or symptoms
- chemotherapy, for children who have signs or symptoms, for very young infants, or for children with unfavorable tumor biology
- radiation therapy for children with neuroblastoma that has spread to the liver

Use our clinical trial search (https://www.cancer.gov/research/participate/clinical-trials-search) to find NCI-supported cancer clinical trials that are accepting patients. You can search for trials based on the type of cancer, the age of the patient, and where the trials are being done. General information (https://www.cancer.gov/research/participate/clinical-trials) about clinical trials is also available.

## Treatment of Recurrent Neuroblastoma

For information about the treatments listed below, see the Treatment Option Overview section.

Patients First Treated for Low-Risk Neuroblastoma

Treatment for recurrent neuroblastoma that comes back in the area where the cancer first formed may include:

- surgery followed by observation or chemotherapy
- chemotherapy that may be followed by surgery

Treatment for recurrent neuroblastoma that comes back in other parts of the body or that has not responded to treatment may include:

- observation
- chemotherapy
- surgery followed by chemotherapy
- treatment as for newly diagnosed high-risk neuroblastoma, for children older than 18 months

Patients First Treated for Intermediate-Risk Neuroblastoma

Treatment for recurrent neuroblastoma that comes back in the area where the cancer first formed may include:

- surgery that may be followed by chemotherapy
- radiation therapy for children whose disease has gotten worse after chemotherapy and second-look surgery

Treatment for recurrent neuroblastoma that comes back in other parts of the body may include:

- treatment as for newly diagnosed high-risk neuroblastoma

Patients First Treated for High-Risk Neuroblastoma

There is no standard treatment for recurrent neuroblastoma in patients first treated for high-risk neuroblastoma. Treatment may include:

- Combination chemotherapy with monoclonal antibody therapy (dinutuximab).
- Iodine 131-MIBG therapy to relieve symptoms and improve quality of life. It may be given alone or in combination with chemotherapy, or followed by stem cell rescue.
- Chemotherapy.
- A clinical trial of CAR T-cell therapy.

Because there is no standard treatment, patients first treated for high-risk neuroblastoma may want to consider a clinical trial. Learn more about clinical trials at Clinical Trials Information for Patients and Caregivers (https://www.cancer.gov/research/participate/clinical-trials).

Patients with Recurrent CNS Neuroblastoma

Treatment for neuroblastoma that recurs (comes back) in the central nervous system (CNS; brain and spinal cord) may include:

- surgery to remove the tumor in the CNS followed by radiation therapy
- chemotherapy, surgery, and radiation therapy

Use our clinical trial search (https://www.cancer.gov/research/participate/clinical-trials-search) to find NCI-supported cancer clinical trials that are accepting patients. You can search for trials based on the type of cancer, the age of the patient, and where the trials are being done. General information (https://www.cancer.gov/research/participate/clinical-trials) about clinical trials is also available.

## To Learn More About Neuroblastoma

For more information from the National Cancer Institute about neuroblastoma, see:

- Neuroblastoma Home Page (https://www.cancer.gov/types/neuroblastoma)
- Neuroblastoma Screening
- Computed Tomography (CT) Scans and Cancer (https://www.cancer.gov/about-cancer/diagnosis-staging/ct-scans-fact-sheet)
- Drugs Approved for Neuroblastoma (https://www.cancer.gov/about-cancer/treatment/drugs/neuroblastoma)
- Targeted Therapy to Treat Cancer (https://www.cancer.gov/about-cancer/treatment/types/targeted-therapies)
- Immunotherapy to Treat Cancer (https://www.cancer.gov/about-cancer/treatment/types/immunotherapy)
- New Approaches to Neuroblastoma Therapy (NANT) (http://www.nant.org/)

For more childhood cancer information and other general cancer resources, visit:

- About Cancer (https://www.cancer.gov/about-cancer)
- Childhood Cancers (https://www.cancer.gov/types/childhood-cancers)
- CureSearch for Children's Cancer (http://www.curesearch.org/)
- Late Effects of Treatment for Childhood Cancer
- Adolescents and Young Adults with Cancer (https://www.cancer.gov/types/aya)
- Children with Cancer: A Guide for Parents (https://www.cancer.gov/publications/patient-education/guide-for-parents)
- Cancer in Children and Adolescents (https://www.cancer.gov/types/childhood-cancers/child-adolescent-cancers-fact-sheet)
- Cancer Staging (https://www.cancer.gov/about-cancer/diagnosis-staging/staging)
- Coping with Cancer (https://www.cancer.gov/about-cancer/coping)
- Questions to Ask Your Doctor about Cancer (https://www.cancer.gov/about-cancer/coping/questions)
- For Survivors, Caregivers, and Advocates (https://cancercontrol.cancer.gov/ocs/resources/survivors.html)

## About This PDQ Summary

### About PDQ

Physician Data Query (PDQ) is the National Cancer Institute's (NCI's) comprehensive cancer information database. The PDQ database contains summaries of the latest published information on cancer prevention, detection, genetics, treatment, supportive care, and complementary and alternative medicine. Most summaries come in two versions. The health professional versions have detailed information written in technical language. The patient versions are written in easy-to-understand, nontechnical language. Both versions have cancer information that is accurate and up to date and most versions are also available in Spanish (https://www.cancer.gov/espanol/publicaciones/pdq).

PDQ is a service of the NCI. The NCI is part of the National Institutes of Health (NIH). NIH is the federal government’s center of biomedical research. The PDQ summaries are based on an independent review of the medical literature. They are not policy statements of the NCI or the NIH.

### Purpose of This Summary

This PDQ cancer information summary has current information about the treatment of neuroblastoma. It is meant to inform and help patients, families, and caregivers. It does not give formal guidelines or recommendations for making decisions about health care.

### Reviewers and Updates

Editorial Boards write the PDQ cancer information summaries and keep them up to date. These Boards are made up of experts in cancer treatment and other specialties related to cancer. The summaries are reviewed regularly and changes are made when there is new information. The date on each summary ("Updated") is the date of the most recent change.

The information in this patient summary was taken from the health professional version, which is reviewed regularly and updated as needed, by the PDQ Pediatric Treatment Editorial Board (https://www.cancer.gov/publications/pdq/editorial-boards/pediatric-treatment).

### Clinical Trial Information

A clinical trial is a study to answer a scientific question, such as whether one treatment is better than another. Trials are based on past studies and what has been learned in the laboratory. Each trial answers certain scientific questions in order to find new and better ways to help cancer patients. During treatment clinical trials, information is collected about the effects of a new treatment and how well it works. If a clinical trial shows that a new treatment is better than one currently being used, the new treatment may become "standard." Patients may want to think about taking part in a clinical trial. Some clinical trials are open only to patients who have not started treatment.

Clinical trials can be found online at NCI's website (https://www.cancer.gov/research/participate/clinical-trials). For more information, call the Cancer Information Service (https://www.cancer.gov/contact/contact-center) (CIS), NCI's contact center, at 1-800-4-CANCER (1-800-422-6237).

### Permission to Use This Summary

PDQ is a registered trademark. The content of PDQ documents can be used freely as text. It cannot be identified as an NCI PDQ cancer information summary unless the whole summary is shown and it is updated regularly. However, a user would be allowed to write a sentence such as “NCI’s PDQ cancer information summary about breast cancer prevention states the risks in the following way: [include excerpt from the summary].”

The best way to cite this PDQ summary is:

PDQ® Pediatric Treatment Editorial Board. PDQ Neuroblastoma Treatment. Bethesda, MD: National Cancer Institute. Updated <MM/DD/YYYY>. Available at: https://www.cancer.gov/types/neuroblastoma/patient/neuroblastoma-treatment-pdq. Accessed <MM/DD/YYYY>. [PMID: 26389278]

Images in this summary are used with permission of the author(s), artist, and/or publisher for use in the PDQ summaries only. If you want to use an image from a PDQ summary and you are not using the whole summary, you must get permission from the owner. It cannot be given by the National Cancer Institute. Information about using the images in this summary, along with many other images related to cancer can be found in Visuals Online (https://visualsonline.cancer.gov/). Visuals Online is a collection of more than 3,000 scientific images.

### Disclaimer

The information in these summaries should not be used to make decisions about insurance reimbursement. More information on insurance coverage is available on Cancer.gov on the Managing Cancer Care (https://www.cancer.gov/about-cancer/managing-care) page.

### Contact Us

More information about contacting us or receiving help with the Cancer.gov website can be found on our Contact Us for Help (https://www.cancer.gov/contact) page. Questions can also be submitted to Cancer.gov through the website’s E-mail Us (https://www.cancer.gov/contact/email-us).